# Endometrial Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of endometrial cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Endometrial Cancer

Cancer of the endometrium is the most common gynecologic malignancy in the United States and accounts for 7% of all cancers in women. Most cases are diagnosed at an early stage and are amenable to treatment with surgery alone.[1] However, patients with pathological features predictive of a high rate of relapse and patients with extrauterine spread at diagnosis have a high rate of relapse despite adjuvant therapy. The most common cause of death in patients with endometrial cancer is cardiovascular disease because of related metabolic risk factors.[2]

### Incidence and Mortality

Estimated new cases and deaths from cancer of the uterine corpus, which includes the endometrium, in the United States in 2025:[1]

- New cases: 69,120.
- Deaths: 13,860.

### Anatomy

The endometrium is the inner lining of the uterus and has both functional and basal layers. The functional layer is hormonally sensitive and is shed in a cyclical pattern during menstruation in reproductive-age women. Both estrogen and progesterone are necessary to maintain a normal endometrial lining. However, factors that lead to an excess of estrogen, including obesity and anovulation, lead to an increase in the deposition of the endometrial lining. These changes may lead to endometrial hyperplasia and, in some cases, endometrial cancer. Whatever the cause, a thickened lining will lead to sloughing of the endometrial tissue through the endometrial canal and into the vagina. As a result, heavy menstrual bleeding or bleeding after menopause are often the initial signs of endometrial cancer. This symptom tends to happen early in the disease course, allowing for identification of the disease at an early stage for most women.

Anatomy of the female reproductive system.

Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.

### Risk Factors

Increasing age is the most important risk factor for most cancers. Other risk factors for endometrial cancer include the following:

- Hormone therapy.[3-6]
  - Postmenopausal estrogen therapy.[7-14]
- Selective estrogen receptor modifiers.[15-17]
  - Tamoxifen therapy.
- Obesity.[18,19]
- Metabolic syndrome.[20]
- Diabetes.[21,22]
- Reproductive factors.
  - Nulliparity.[23]
  - Early menarche or late menopause.[24]
  - Polycystic ovary syndrome.[25]
- Family history/genetic predisposition.
  - Mother, sister, or daughter with uterine cancer.[26]
  - Certain genetic syndromes, such as Lynch syndrome.[27 -30]
- Endometrial hyperplasia.[31]

For more information, see Endometrial Cancer Prevention.

Prolonged, unopposed estrogen exposure has been associated with an increased risk of endometrial cancer.[9,32] However, combined estrogen and progesterone therapy prevents this increased risk.[33,34]

Tamoxifen, which is used to treat and prevent breast cancer (NSABP-B-14 (http://www.nsabp.pitt.edu/B-14.asp)), is associated with an increased risk of endometrial cancer related to the estrogenic effect of tamoxifen on the endometrium.[15,35] It is important that patients who are receiving tamoxifen and experiencing abnormal uterine bleeding have follow-up examinations and biopsy of the endometrial lining. The U.S. Food and Drug Administration released a black box warning (https://www.accessdata.fda.gov/drugsatfda_docs/label/2005/17970s053lbl.pdf) that includes data about the increase in uterine malignancies associated with tamoxifen use. For more information about risk factors for Lynch syndrome–associated endometrial cancer, see the Lynch Syndrome section in Genetics of Breast and Gynecologic Cancers.

### Clinical Features

Irregular vaginal bleeding is the most common presenting sign of endometrial cancer. It generally occurs early in the disease process and is the reason why most patients are diagnosed with highly curable stage I endometrial cancer.

### Diagnostic Evaluation

The following procedures may be used to detect endometrial cancer:

- Transvaginal ultrasonography.
- Endometrial biopsy.
- Pelvic examination.
- Dilatation and curettage.
- Hysteroscopy.

To definitively diagnose endometrial cancer, a procedure that directly samples the endometrial tissue is necessary.

The Pap smear is not a reliable screening procedure for the detection of endometrial cancer, even though a retrospective study found a strong correlation between positive cervical cytology and high-risk endometrial disease (i.e., high-grade tumor and deep myometrial invasion).[36] A prospective study found a statistically significant association between malignant cytology and increased risk of nodal disease.[37]

### Prognostic Factors

Prognostic factors for endometrial cancer include:

- Tumor stage and grade (including extrauterine nodal spread).
- Hormone receptor status.

#### Tumor stage and grade (including extrauterine nodal spread)

Table 1 highlights the risk of nodal metastasis based on findings at the time of staging surgery:[38]

Table 1. Risk of Nodal Metastasis in Clinical Stage I Endometrial Cancer

Prognostic Group | Patient Characteristics | Risk of Nodal Involvement
A | Grade 1 tumors involving only endometrium | <5%
A | No evidence of intraperitoneal spread | <5%
B | Grade 2–3 tumors | 5%–9% pelvic nodes
B | Invasion of <50% of myometrium | 5%–9% pelvic nodes
B | No intraperitoneal spread | 4% para-aortic nodes
C | Deep muscle invasion | 20%–60% pelvic nodes
C | High-grade tumors | 10%–30% para-aortic nodes
C | Intraperitoneal spread | 10%–30% para-aortic nodes

A Gynecologic Oncology Group study related surgical-pathological parameters and postoperative treatment to recurrence-free interval and recurrence site. Grade 3 histology and deep myometrial invasion in patients without extrauterine spread were the greatest determinants of recurrence. In this study, the presence of the following factors greatly increased the frequency of recurrence:[39,40]

- Positive pelvic nodes.
- Adnexal metastasis.
- Positive peritoneal cytology.
- Capillary space involvement.
- Involvement of the isthmus or cervix.
- Positive para-aortic nodes (includes all grades and depth of invasion). Of the cases with aortic node metastases, 98% were in patients with positive pelvic nodes, intra-abdominal metastases, or tumor invasion of the outer 33% of the myometrium.

When the only evidence of extrauterine spread is positive peritoneal cytology, the influence on outcome is unclear. The value of therapy directed at this cytological finding is not well founded,[41-46] and some data are contradictory.[47] Although the collection of cytology specimens is still suggested, a positive result does not upstage the cancer. Other extrauterine disease must be present before additional postoperative therapy is considered.

Involvement of the capillary-lymphatic space on histopathological examination correlates with extrauterine and nodal spread of tumor.[48]

#### Hormone receptor status

When possible, progesterone and estrogen receptor statuses, assessed either by biochemical or immunohistochemical methods, are included in the evaluation of patients with stage I and stage II cancer.[49-51]

One report found progesterone receptor levels to be the single most important prognostic indicator of 3-year survival in clinical stages I and II disease. Patients with progesterone receptor levels of 100 or greater had a 3-year disease-free survival rate of 93%, compared with 36% for those with a level below 100. After adjusting for progesterone receptor levels, only cervical involvement and peritoneal cytology were significant prognostic variables.[52]

Other reports confirm the importance of hormone receptor status as an independent prognostic factor.[53] Additionally, immunohistochemical staining of paraffin-embedded tissue for both estrogen and progesterone receptors has been shown to correlate with Fédération Internationale de Gynécologie et d’Obstétrique (FIGO) grade and survival.[49-51]

#### Other prognostic factors

Other factors predictive of poor prognosis include:[51,54,55]

- A high S-phase fraction.
- Aneuploidy.
- PTEN loss-of-function variant.
- PIK3CA variant.
- TP53 variant.
- Oncogene expression (e.g., overexpression of the HER2/neu oncogene has been associated with a poor overall prognosis).

A general review of prognostic factors has been published.[56]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Ward KK, Shah NR, Saenz CC, et al.: Cardiovascular disease is the leading cause of death among endometrial cancer patients. Gynecol Oncol 126 (2): 176-9, 2012.22507532
Beral V, Bull D, Reeves G, et al.: Endometrial cancer and hormone-replacement therapy in the Million Women Study. Lancet 365 (9470): 1543-51, 2005 Apr 30-May 6.15866308
Anderson GL, Limacher M, Assaf AR, et al.: Effects of conjugated equine estrogen in postmenopausal women with hysterectomy: the Women's Health Initiative randomized controlled trial. JAMA 291 (14): 1701-12, 2004.15082697
Furness S, Roberts H, Marjoribanks J, et al.: Hormone therapy in postmenopausal women and risk of endometrial hyperplasia. Cochrane Database Syst Rev (2): CD000402, 2009.19370558
Grady D, Gebretsadik T, Kerlikowske K, et al.: Hormone replacement therapy and endometrial cancer risk: a meta-analysis. Obstet Gynecol 85 (2): 304-13, 1995.7824251
Smith DC, Prentice R, Thompson DJ, et al.: Association of exogenous estrogen and endometrial carcinoma. N Engl J Med 293 (23): 1164-7, 1975.1186789 76051178
Mack TM, Pike MC, Henderson BE, et al.: Estrogens and endometrial cancer in a retirement community. N Engl J Med 294 (23): 1262-7, 1976.177870 76174341
Ziel HK, Finkle WD: Increased risk of endometrial carcinoma among users of conjugated estrogens. N Engl J Med 293 (23): 1167-70, 1975.171569 76051179
Walker AM, Jick H: Cancer of the corpus uteri: increasing incidence in the United States, 1970--1975. Am J Epidemiol 110 (1): 47-51, 1979.463863 79228972
Gray LA, Christopherson WM, Hoover RN: Estrogens and endometrial carcinoma. Obstet Gynecol 49 (4): 385-9, 1977.193072 77171944
McDonald TW, Annegers JF, O'Fallon WM, et al.: Exogenous estrogen and endometrial carcinoma: case-control and incidence study. Am J Obstet Gynecol 127 (6): 572-80, 1977.190887 77131902
Antunes CM, Strolley PD, Rosenshein NB, et al.: Endometrial cancer and estrogen use. Report of a large case-control study. N Engl J Med 300 (1): 9-13, 1979.213722 79053188
Shapiro S, Kelly JP, Rosenberg L, et al.: Risk of localized and widespread endometrial cancer in relation to recent and discontinued use of conjugated estrogens. N Engl J Med 313 (16): 969-72, 1985.2995807 86014238
Fisher B, Costantino JP, Redmond CK, et al.: Endometrial cancer in tamoxifen-treated breast cancer patients: findings from the National Surgical Adjuvant Breast and Bowel Project (NSABP) B-14. J Natl Cancer Inst 86 (7): 527-37, 1994.8133536 94180408
Cummings SR, Eckert S, Krueger KA, et al.: The effect of raloxifene on risk of breast cancer in postmenopausal women: results from the MORE randomized trial. Multiple Outcomes of Raloxifene Evaluation. JAMA 281 (23): 2189-97, 1999.10376571 99303064
DeMichele A, Troxel AB, Berlin JA, et al.: Impact of raloxifene or tamoxifen use on endometrial cancer risk: a population-based case-control study. J Clin Oncol 26 (25): 4151-9, 2008.18757329
Bergström A, Pisani P, Tenet V, et al.: Overweight as an avoidable cause of cancer in Europe. Int J Cancer 91 (3): 421-30, 2001.11169969 21101244
Aune D, Navarro Rosenblatt DA, Chan DS, et al.: Anthropometric factors and endometrial cancer risk: a systematic review and dose-response meta-analysis of prospective studies. Ann Oncol 26 (8): 1635-48, 2015.25791635
Esposito K, Chiodini P, Capuano A, et al.: Metabolic syndrome and endometrial cancer: a meta-analysis. Endocrine 45 (1): 28-36, 2014.23640372
Troisi R, Potischman N, Hoover RN, et al.: Insulin and endometrial cancer. Am J Epidemiol 146 (6): 476-82, 1997.9290508 97435841
Tsilidis KK, Kasimis JC, Lopez DS, et al.: Type 2 diabetes and cancer: umbrella review of meta-analyses of observational studies. BMJ 350: g7607, 2015.25555821
Dossus L, Allen N, Kaaks R, et al.: Reproductive risk factors and endometrial cancer: the European Prospective Investigation into Cancer and Nutrition. Int J Cancer 127 (2): 442-51, 2010.19924816
Brown SB, Hankinson SE: Endogenous estrogens and the risk of breast, endometrial, and ovarian cancers. Steroids 99 (Pt A): 8-10, 2015.25555473
Barry JA, Azizia MM, Hardiman PJ: Risk of endometrial, ovarian and breast cancer in women with polycystic ovary syndrome: a systematic review and meta-analysis. Hum Reprod Update 20 (5): 748-58, 2014 Sep-Oct.24688118
Win AK, Reece JC, Ryan S: Family history and risk of endometrial cancer: a systematic review and meta-analysis. Obstet Gynecol 125 (1): 89-98, 2015.25560109
Daniels MS: Genetic testing by cancer site: uterus. Cancer J 18 (4): 338-42, 2012 Jul-Aug.22846735
Dunlop MG, Farrington SM, Nicholl I, et al.: Population carrier frequency of hMSH2 and hMLH1 mutations. Br J Cancer 83 (12): 1643-5, 2000.11104559
Lynch HT, Lynch J, Conway T, et al.: Familial aggregation of carcinoma of the endometrium. Am J Obstet Gynecol 171 (1): 24-7, 1994.8030707
Lu KH, Schorge JO, Rodabaugh KJ, et al.: Prospective determination of prevalence of lynch syndrome in young women with endometrial cancer. J Clin Oncol 25 (33): 5158-64, 2007.17925543
Widra EA, Dunton CJ, McHugh M, et al.: Endometrial hyperplasia and the risk of carcinoma. Int J Gynecol Cancer 5 (3): 233-235, 1995.11578482
Jick SS, Walker AM, Jick H: Estrogens, progesterone, and endometrial cancer. Epidemiology 4 (1): 20-4, 1993.8380547 93129672
Jick SS: Combined estrogen and progesterone use and endometrial cancer. Epidemiology 4 (4): 384, 1993.8347751 93350068
Bilezikian JP: Major issues regarding estrogen replacement therapy in postmenopausal women. J Womens Health 3 (4): 273-82, 1994.
van Leeuwen FE, Benraadt J, Coebergh JW, et al.: Risk of endometrial cancer after tamoxifen treatment of breast cancer. Lancet 343 (8895): 448-52, 1994.7905955 94142428
DuBeshter B, Warshal DP, Angel C, et al.: Endometrial carcinoma: the relevance of cervical cytology. Obstet Gynecol 77 (3): 458-62, 1991.1992417 91125744
Larson DM, Johnson KK, Reyes CN, et al.: Prognostic significance of malignant cervical cytology in patients with endometrial cancer. Obstet Gynecol 84 (3): 399-403, 1994.8058238 94336122
Takeshima N, Hirai Y, Tanaka N, et al.: Pelvic lymph node metastasis in endometrial cancer with no myometrial invasion. Obstet Gynecol 88 (2): 280-2, 1996.8692516 96305283
Morrow CP, Bundy BN, Kurman RJ, et al.: Relationship between surgical-pathological risk factors and outcome in clinical stage I and II carcinoma of the endometrium: a Gynecologic Oncology Group study. Gynecol Oncol 40 (1): 55-65, 1991.1989916 91115216
Lanciano RM, Corn BW, Schultz DJ, et al.: The justification for a surgical staging system in endometrial carcinoma. Radiother Oncol 28 (3): 189-96, 1993.8255995 94077989
Ambros RA, Kurman RJ: Combined assessment of vascular and myometrial invasion as a model to predict prognosis in stage I endometrioid adenocarcinoma of the uterine corpus. Cancer 69 (6): 1424-31, 1992.1371712 92174071
Turner DA, Gershenson DM, Atkinson N, et al.: The prognostic significance of peritoneal cytology for stage I endometrial cancer. Obstet Gynecol 74 (5): 775-80, 1989.2812655 90045272
Piver MS, Recio FO, Baker TR, et al.: A prospective trial of progesterone therapy for malignant peritoneal cytology in patients with endometrial carcinoma. Gynecol Oncol 47 (3): 373-6, 1992.1473752 93114661
Kadar N, Homesley HD, Malfetano JH: Positive peritoneal cytology is an adverse factor in endometrial carcinoma only if there is other evidence of extrauterine disease. Gynecol Oncol 46 (2): 145-9, 1992.1500014 92363279
Lurain JR: The significance of positive peritoneal cytology in endometrial cancer. Gynecol Oncol 46 (2): 143-4, 1992.1500013 92363278
Lurain JR, Rice BL, Rademaker AW, et al.: Prognostic factors associated with recurrence in clinical stage I adenocarcinoma of the endometrium. Obstet Gynecol 78 (1): 63-9, 1991.2047070 91261340
Garg G, Gao F, Wright JD, et al.: Positive peritoneal cytology is an independent risk-factor in early stage endometrial cancer. Gynecol Oncol 128 (1): 77-82, 2013.23032094
Hanson MB, van Nagell JR, Powell DE, et al.: The prognostic significance of lymph-vascular space invasion in stage I endometrial cancer. Cancer 55 (8): 1753-7, 1985.3978563 85151608
Carcangiu ML, Chambers JT, Voynick IM, et al.: Immunohistochemical evaluation of estrogen and progesterone receptor content in 183 patients with endometrial carcinoma. Part I: Clinical and histologic correlations. Am J Clin Pathol 94 (3): 247-54, 1990.1697729 90372301
Chambers JT, Carcangiu ML, Voynick IM, et al.: Immunohistochemical evaluation of estrogen and progesterone receptor content in 183 patients with endometrial carcinoma. Part II: Correlation between biochemical and immunohistochemical methods and survival. Am J Clin Pathol 94 (3): 255-60, 1990.1697730 90372302
Gurpide E: Endometrial cancer: biochemical and clinical correlates. J Natl Cancer Inst 83 (6): 405-16, 1991.1999848 91155130
Ingram SS, Rosenman J, Heath R, et al.: The predictive value of progesterone receptor levels in endometrial cancer. Int J Radiat Oncol Biol Phys 17 (1): 21-7, 1989.2745195 89308142
Creasman WT: Prognostic significance of hormone receptors in endometrial cancer. Cancer 71 (4 Suppl): 1467-70, 1993.8431882 93161278
Friberg LG, Norén H, Delle U: Prognostic value of DNA ploidy and S-phase fraction in endometrial cancer stage I and II: a prospective 5-year survival study. Gynecol Oncol 53 (1): 64-9, 1994.8175025 94229619
Hetzel DJ, Wilson TO, Keeney GL, et al.: HER-2/neu expression: a major prognostic factor in endometrial cancer. Gynecol Oncol 47 (2): 179-85, 1992.1361478 93106494
Binder PS, Mutch DG: Update on prognostic markers for endometrial cancer. Womens Health (Lond Engl) 10 (3): 277-88, 2014.24956294

## Cellular Classification of Endometrial Cancer

Endometrial cancers are classified as one of the following two types:

- Type 1 may arise from complex atypical hyperplasia and is pathogenetically linked to unopposed estrogenic stimulation.
- Type 2 develops from atrophic endometrium and is not linked to hormonally driven pathogenesis.

The most common type of endometrial cancer is endometrioid adenocarcinoma.

Frequency of endometrial cancer cell types is as follows:

1. Endometrioid (75%) comprises malignant glandular epithelial elements; an admixture of squamous metaplasia is not uncommon.
  a. Ciliated adenocarcinoma.
  b. Secretory adenocarcinoma.
  c. Papillary and villoglandular adenocarcinomas are histologically similar to those noted in the ovary and the fallopian tube. The prognosis is worse for these tumors.[1]
  d. Adenocarcinoma with squamous differentiation.
    - Adenoacanthoma.
    - Adenosquamous cells contain malignant glandular and squamous epithelial elements.[2]
2. Mixed, defined as two carcinomatous cell types, with the smaller component making up at least 10% of the total (10%).
3. Uterine papillary serous (<10%).
4. Clear cell (4%) is histologically similar to those noted in the ovary and the fallopian tube. The prognosis for clear cell tumors is worse.[1]
5. Carcinosarcoma (3%), also known as malignant mixed mesodermal tumor, has both carcinomatous and sarcomatous elements. This tumor was historically categorized as a subtype of uterine sarcomas; however, recent evidence points to its origin as an adenocarcinoma that has undergone differentiation into the sarcomatous elements.
6. Mucinous (1%).
7. Squamous cell (<1%).
8. Undifferentiated (<1%).

### Molecular Subgroups

PTEN variants are more common in type 1 endometrial cancers; TP53 and HER2/neu overexpression are more common in type 2 endometrial cancers, although some overlap exists.

The Cancer Genome Atlas's full genetic display of hundreds of endometrial cancers identified four subtypes to further characterize endometrial cancers:[3]

- POLE ultramutated. This subtype has clinical significance, and adjuvant therapies are avoided.
- Microsatellite instability hypermutated.
- Copy number low.
- Copy number high.

These categories can be used to stratify patients into low- and high-risk prognostic categories. A modification of The Cancer Genome Atlas methods into more accessible tests was also successful in discriminating cancers into relevant prognostic categories. However, a combination of previously known risk factors with the genetic data was the most effective at determining prognostic categories.[4]

### References

Gusberg SB: Virulence factors in endometrial cancer. Cancer 71 (4 Suppl): 1464-6, 1993.8431881 93161277
Zaino RJ, Kurman R, Herbold D, et al.: The significance of squamous differentiation in endometrial carcinoma. Data from a Gynecologic Oncology Group study. Cancer 68 (10): 2293-302, 1991.1913465 92005187
Kandoth C, Schultz N, Cherniack AD, et al.: Integrated genomic characterization of endometrial carcinoma. Nature 497 (7447): 67-73, 2013.23636398
Talhouk A, McConechy MK, Leung S, et al.: A clinically applicable molecular-based classification for endometrial cancers. Br J Cancer 113 (2): 299-310, 2015.26172027

## Stage Information for Endometrial Cancer

The pattern of endometrial cancer spread is partially dependent on the degree of cellular differentiation. Well-differentiated tumors tend to limit their spread to the surface of the endometrium; myometrial invasion is less common. Myometrial invasion occurs much more frequently in patients with poorly differentiated tumors and is frequently a harbinger of lymph node involvement and distant metastases.[1,2]

Metastatic spread occurs in a characteristic pattern. Regional spread to the pelvic and para-aortic nodes is common. Distant metastasis most commonly involves the following sites:

- Lungs.
- Inguinal and supraclavicular nodes.
- Liver.
- Bones.
- Brain.
- Vagina.

### FIGO Staging

The Fédération Internationale de Gynécologie et d’Obstétrique (FIGO) and the American Joint Committee on Cancer (AJCC) have both designated staging systems for endometrial cancer. The FIGO system is the most commonly used staging system for endometrial cancer.[3-5] The 2023 FIGO staging update has not been widely adopted because it incorporates molecular-based results, and some physicians do not have access to those data for their patients. Additionally, given the significant changes in the 2023 FIGO staging system, especially in the definition of early stage disease, more outcome data are needed so it might be more prudent to use the 2021 system in a clinical setting while discussing prognosis and treatment with patients. Therefore, both the 2023 and the 2021 FIGO staging systems are presented in this section.

FIGO stages I to IV are further subdivided by the histological grade (G) of the tumor, for example, stage IB G2. Carcinosarcomas, which had previously been designated as sarcomas, are now considered poorly differentiated adenocarcinomas; as such, they are included in this system.[5]

#### 2023 FIGO staging for endometrial cancer

Table 2. 2023 FIGO Definitions for Stage I Cancer of the Endometrium^a,b,c^

Stage | | Description
I | | Confined to the uterine corpus and ovary.^d^
IA | | Disease limited to the endometrium OR nonaggressive histological type, i.e., low-grade endometrioid, with invasion of less than half of myometrium with no or focal LVSI OR good prognosis disease.
| IA1 | Nonaggressive histological type limited to an endometrial polyp OR confined to the endometrium.
| IA2 | Nonaggressive histological types involving less than half of the myometrium with no or focal LVSI.
| IA3 | Low-grade endometrioid carcinomas limited to the uterus and ovary.^d^
IB | | Nonaggressive histological types with invasion of half or more of the myometrium, and with no or focal LVSI.^e^
IC | | Aggressive histological types^f^ limited to a polyp or confined to the endometrium.

T = primary tumor; N = regional lymph node; M = distant metastasis; p = pathological; AJCC = American Joint Committee on Cancer; ESGO-ESTRO-ESP = European Society of Gynaecological Oncology, European Society for Radiotherapy and Oncology, European Society of Pathology; FIGO = Fédération Internationale de Gynécologie et d’Obstétrique; ITC = isolated tumor cell; LVSI = lymphovascular space involvement; MMRd = mismatch repair deficiency; NSMP = no specific molecular profile; POLEmut = pathogenic POLE mutation; p53abn = TP53 abnormal; SLN = sentinel lymph node; WHO = World Health Organization.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[3]

^b^Endometrial cancer is surgically staged and pathologically examined. In all stages, the grade of the lesion, the histological type and LVSI must be recorded. If available and feasible, molecular classification testing (POLEmut, MMRd, NSMP, p53abn) is encouraged in all patients with endometrial cancer for prognostic risk-group stratification and as factors that might influence adjuvant and systemic treatment decisions (see Table 6).

^c^In early endometrial cancer, the standard surgery is a total hysterectomy with bilateral salpingo-oophorectomy via a minimally invasive laparoscopic approach. Staging procedures include infracolic omentectomy in specific histological subtypes, such as serous and undifferentiated endometrial carcinoma, as well as carcinosarcoma, due to the high risk of microscopic omental metastases. Lymph node staging should be performed in patients with intermediate-high/high-risk disease. SLN biopsy is an adequate alternative to systematic lymphadenectomy for staging proposes. SLN biopsy can also be considered in patients with low−/low-intermediate-risk disease to rule out occult lymph node metastases and to identify disease truly confined to the uterus. Thus, the ESGO-ESTRO-ESP guidelines allow an approach of SLN in all patients with endometrial carcinoma, which is endorsed by FIGO. In assumed early endometrial cancer, an SLN biopsy in an adequate alternative to systematic lymphadenectomy in high-intermediate and high-risk cases for the purpose of lymph node staging and can also be considered in low–/intermediate-risk disease to rule out occult lymph node metastases. An SLN biopsy should be done in association with thorough (ultrastaging) staging as it will increase the detection of low-volume disease in lymph nodes.

^d^Low-grade endometrioid carcinomas involving both the endometrium and the ovary are considered to have a good prognosis, and no adjuvant treatment is recommended if all the below criteria are met. Disease limited to low-grade endometrioid carcinomas involving the endometrium and ovaries (Stage IA3) must be distinguished from extensive spread of the endometrial carcinoma to the ovary (Stage IIIA1), by the following criteria: (1) no more than superficial myometrial invasion is present (<50%); (2) absence of extensive/substantial LVSI; (3) absence of additional metastases; and (4) the ovarian tumor is unilateral, limited to the ovary, without capsule invasion/rupture (equivalent to pT1a).

^e^LVSI as defined in WHO 2021: extensive/substantial, ≥5 vessels involved.

^f^Grade and histological type are as follows: (1) Serous adenocarcinomas, clear cell adenocarcinomas, mesonephric-like carcinomas, gastrointestinal-type mucinous endometrial carcinoma, undifferentiated carcinomas, and carcinosarcomas are considered high grade by definition. For endometrioid carcinomas, grade is based on the proportion of solid areas: low grade = grade 1 (≤5%) and grade 2 (6%–50%); and high grade = grade 3 (>50%). Nuclear atypia excessive for the grade raises the grade of a grade 1 or 2 tumor by one. The presence of unusual nuclear atypia in an architecturally low-grade tumor should prompt the evaluation of TP53 and consideration of serous carcinoma. Adenocarcinomas with squamous differentiation are graded according to the microscopic features of the glandular component; (2) Nonaggressive histological types are composed of low-grade (grade 1 and 2) endometrioid carcinomas. Aggressive histological types are composed of high-grade endometrioid carcinomas (grade 3), serous, clear cell, undifferentiated, mixed, mesonephric-like, gastrointestinal mucinous type carcinomas, and carcinosarcomas; and (3) It should be noted that high-grade endometrioid carcinomas (grade 3) are a prognostically, clinically, and molecularly heterogenous disease, and the tumor type that benefits most from applying molecular classification for improved prognostication and for treatment decision-making. Without molecular classification, high-grade endometrioid carcinomas cannot appropriately be allocated to a risk group, and thus, molecular profiling is particularly recommended in these patients. For practical purposes and to avoid undertreatment of patients, if the molecular classification is unknown, high-grade endometrioid carcinomas were grouped together with the aggressive histological types in the actual FIGO classification.

^g^Micrometastases are considered to be metastatic involvement (pN1 [mi]). The prognostic significance of ITCs is unclear. The presence of ITCs should be documented and is regarded as pN0(I+). According to the AJCC 8th edition staging, macrometastases are >2 mm in size, micrometastases are >0.2–2 mm and/or >200 cells, and ITCs are ≤0.2 mm and ≤200 cells. These definitions are based on staging established by FIGO and the 8th edition of the AJCC Cancer Staging Manual.

Table 3. 2023 FIGO Definitions for Stage II Cancer of the Endometrium^a,b,c^

Stage | Description
II | Invasion of cervical stroma without extrauterine extension OR with substantial LVSI OR aggressive histological types with myometrial invasion.
IIA | Invasion of the cervical stroma of nonaggressive histological types.
IIB | Substantial LVSI^e^ of nonaggressive histological types.
IIC | Aggressive histological types^f^ with any myometrial involvement.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique; LVSI = lymphovascular space involvement.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[3]

For the explanations for footnotes ^b−f^, see Table 2.

Table 4. 2023 FIGO Definitions for Stage III Cancer of the Endometrium^a,b,c^

Stage | | Description
III | | Local and/or regional spread of the tumor of any histological subtype.
IIIA | | Invasion of uterine serosa, adnexa, or both by direct extension or metastasis.
| IIIA1 | Spread to ovary or fallopian tube (except when meeting stage IA3 criteria).^d^
| IIIA2 | Involvement of uterine subserosa or spread through the uterine serosa.
IIIB | | Metastasis or direct spread to the vagina and/or to the parametria or pelvic peritoneum.
| IIIB1 | Metastasis or direct spread to the vagina and/or the parametria.
| IIIB2 | Metastasis to the pelvic peritoneum.
IIIC | | Metastasis to the pelvic or para-aortic lymph nodes or both.^g^
| IIIC1 | Metastasis to the pelvic lymph nodes.
| IIIC1i | Micrometastasis.
| IIIC1ii | Macrometastasis.
| IIIC2 | Metastasis to para-aortic lymph nodes up to the renal vessels, with or without metastasis to the pelvic lymph nodes.
| IIIC2i | Micrometastasis.
| IIIC2ii | Macrometastasis.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[3]

For the explanations for footnotes ^b−d^ and ^g^, see Table 2.

Table 5. 2023 FIGO Definitions for Stage IV Cancer of the Endometrium^a,b,c^

Stage | Description
IV | Spread to the bladder mucosa and/or intestinal mucosa and/or distance metastasis.
IVA | Invasion of the bladder mucosa and/or the intestinal/bowel mucosa.
IVB | Abdominal peritoneal metastasis beyond the pelvis.
IVC | Distant metastasis, including metastasis to any extra- or intra-abdominal lymph nodes above the renal vessels, lungs, liver, brain, or bone.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[3]

For the explanations for footnotes ^b−c^, see Table 2.

Table 6. 2023 FIGO Definitions for Endometrial Cancer Stage With Molecular Classification^a,b^

Stage Designation | Molecular Findings in Patients With Early Endometrial Cancer (Stages I and II After Surgical Staging)
IAm_POLEmut_ | POLEmut endometrial carcinoma, confined to the uterine corpus or with cervical extension, regardless of the degree of LVSI or histological type.
IICm_p53abn_ | p53abn endometrial carcinoma confined to the uterine corpus with any myometrial invasion, with or without cervical invasion, and regardless of the degree of LVSI or histological type.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique; LVSI = lymphovascular space involvement; MMRd = mismatch repair deficiency; MSI = microsatellite instability; NSMP = no specific molecular profile; POLEmut = pathogenic POLE mutation; p53abn = TP53 abnormal.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[3]

^b^When feasible, the addition of molecular subtype to the staging criteria allows a better prediction of prognosis in a staging/prognosis scheme. The performance of complete molecular classification (POLEmut, MMRd, NSMP, p53abn) is encouraged in all cases of endometrial cancer for prognostic risk-group stratification and as potential influencing factors of adjuvant or systemic treatment decisions. Molecular subtype assignment can be done on a biopsy, in which case it need not be repeated on the hysterectomy specimen. When performed, these molecular classifications should be recorded in all stages. A pathogenic POLE mutation (POLEmut) is associated with a good prognosis. MMRd or MSI and NSMP are associated with an intermediate prognosis. Abnormal TP53 (p53abn) is associated with a poor prognosis. When the molecular classification is known the staging is modified as follows: (1) FIGO Stages I and II are based on surgical/anatomical and histological findings. In case the molecular classification reveals POLEmut or p53abn status, the FIGO stage is modified in the early stage of the disease. This is depicted in the FIGO stage by the addition of “m” for molecular classification, and a subscript is added to denote POLEmut or p53abn status, as shown in the table. MMRd or NSMP status do not modify early FIGO stages; however, these molecular classifications should be recorded for the purpose of data collection. When molecular classification reveals MMRd or NSMP, it should be recorded as Stage Im_MMRd_ or Stage Im_NSMP_ and Stage IIm_MMRd_ or Stage IIm_NSMP_; (2) FIGO Stages III and IV are based on surgical/anatomical findings. The stage category is not modified by molecular classification; however, the molecular classification should be recorded if known. When the molecular classification is known, it should be recorded as Stage IIIm or Stage IVm with the appropriate subscript for the purpose of data collection. For example, when molecular classification reveals p53abn, it should be recorded as Stage IIIm_p53abn_ or Stage IVm_p53abn_.

#### 2021 FIGO staging for endometrial cancer

Table 7. 2021 FIGO Definitions for Stage I Cancer of the Endometrium^a^

Stage | Description | Illustration
I^b^ | Tumor confined to the corpus uteri. | Stage IA and stage IB endometrial cancer shown in two cross-section drawings of the uterus and cervix. Drawing on the left shows stage IA, with cancer in the endometrium and myometrium of the uterus. Drawing on the right shows stage IB, with cancer more than halfway through the myometrium. Also shown are the fallopian tubes, ovaries, and vagina
IA^b^ | No or less than half myometrial invasion.
IB^b^ | Invasion equal to or more than half of the myometrium.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[4]

^b^G1, G2, or G3 (G = grade).

Table 8. 2021 FIGO Definitions for Stage II Cancer of the Endometrium^a^

Stage | Description | Illustration
II^b^ | Tumor invades cervical stroma but does not extend beyond the uterus.^c^ | Stage II endometrial cancer shown in a cross-section drawing of the uterus, cervix, fallopian tubes, ovaries, and vagina. Cancer is shown in the endometrium and myometrium of the uterus and in the cervix.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[4]

^b^G1, G2, or G3 (G = grade).

^c^Endocervical glandular involvement is considered stage I; it is no longer considered stage II.

Table 9. 2021 FIGO Definitions for Stage III Cancer of the Endometrium^a^

Stage | Description | Illustration
III^b^ | Local and/or regional spread of the tumor.
IIIA^b^ | Tumor invades the serosa of the corpus uteri and/or adnexae.^c^ | Stage IIIA endometrial cancer shown in a cross-section drawing of the uterus, ligaments of the uterus, cervix, fallopian tubes, ovaries, and vagina. Cancer is shown in the endometrium of the uterus, the outer layer of the uterus, a fallopian tube, an ovary, and a ligament of the uterus.
IIIB^b^ | Vaginal and/or parametrial involvement.^c^ | Stage IIIB endometrial cancer shown in a cross-section drawing of the uterus, cervix, fallopian tubes, ovaries, and vagina. Cancer is shown in the endometrium of the uterus, the parametrium, the cervix, and the vagina.
IIIC^b^ | Metastases to pelvic and/or para-aortic lymph nodes.^c^ | Stage IIIC endometrial cancer; drawing shows cancer in the endometrium and myometrium of the uterus. Also shown is cancer in lymph nodes in the pelvis and near the aorta.
IIIC1^b^ | Positive pelvic nodes. | Stage IIIC endometrial cancer; drawing shows cancer in the endometrium and myometrium of the uterus. Also shown is cancer in lymph nodes in the pelvis and near the aorta.
IIIC2^b^ | Positive para-aortic lymph nodes with or without positive pelvic lymph nodes. | Stage IIIC endometrial cancer; drawing shows cancer in the endometrium and myometrium of the uterus. Also shown is cancer in lymph nodes in the pelvis and near the aorta.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[4]

^b^G1, G2, or G3 (G = grade).

^c^Positive cytology has to be reported separately without changing the stage.

Table 10. 2021 FIGO Definitions for Stage IV Cancer of the Endometrium^a^

Stage | Description | Illustration
IV^b^ | Tumor invades bladder and/or bowel mucosa, and/or distant metastases.
IVA^b^ | Tumor invasion of bladder and/or bowel mucosa. | Stage IVA endometrial cancer shown in a side-view cross-section drawing of the uterus, bladder, cervix, vagina, small intestine, and large intestine. Cancer is shown in the bladder, uterus, and bowel.
IVB^b^ | Distant metastases, including intra-abdominal metastases and/or inguinal lymph nodes. | Stage IVB endometrial cancer; drawing shows cancer that has spread to parts of the body outside the pelvis, including the abdomen and lymph nodes in the groin. An inset shows cancer cells spreading from the endometrium, through the blood and lymph system, to another part of the body where metastatic cancer has formed.

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from FIGO Committee on Gynecologic Oncology.[4]

^b^G1, G2, or G3 (G = grade).

### References

Hendrickson M, Ross J, Eifel PJ, et al.: Adenocarcinoma of the endometrium: analysis of 256 cases with carcinoma limited to the uterine corpus. Pathology review and analysis of prognostic variables. Gynecol Oncol 13 (3): 373-92, 1982.6284595 82237179
Nori D, Hilaris BS, Tome M, et al.: Combined surgery and radiation in endometrial carcinoma: an analysis of prognostic factors. Int J Radiat Oncol Biol Phys 13 (4): 489-97, 1987.3104248 87165252
Berek JS, Matias-Guiu X, Creutzberg C, et al.: FIGO staging of endometrial cancer: 2023. Int J Gynaecol Obstet 162 (2): 383-394, 2023.37337978
Koskas M, Amant F, Mirza MR, et al.: Cancer of the corpus uteri: 2021 update. Int J Gynaecol Obstet 155 (Suppl 1): 45-60, 2021.34669196
Corpus uteri – carcinoma and carcinosarcoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 661-69.

## Treatment Option Overview for Endometrial Cancer

The degree of tumor differentiation has an important effect on the natural history of this disease and on treatment selection.

Patients with endometrial cancer who have localized disease are usually cured. Best results are obtained with one of two standard treatments:

- Hysterectomy with bilateral salpingo-oophorectomy.
- Hysterectomy with bilateral salpingo-oophorectomy and adjuvant radiation therapy (when deep invasion of the myometrial muscle [more than 50% of the myometrium] or grade 3 tumor with myometrial invasion is present).

Patients with regional and distant metastases are rarely cured, although they are occasionally responsive to standard hormone therapy.

Progestational agents have been evaluated as adjuvant therapy in several randomized trials. A meta-analysis by the Cochrane group confirms no clinical benefit to adjuvant progestogens in clinical stage I disease.[1][Level of evidence A1]

The treatment options for each stage of endometrial cancer are presented in Table 11.

Table 11. Treatment Options for Endometrial Cancer

Stage (FIGO Staging Definitions) | | Treatment Options
Stage I and stage II endometrial cancer | Grades 1 and 2 | Surgery with or without lymph node sampling
Stage I and stage II endometrial cancer | Grades 1 and 2 | Postoperative vaginal brachytherapy
Stage I and stage II endometrial cancer | Grades 1 and 2 | Radiation therapy alone
Stage I and stage II endometrial cancer | Grade 3 (includes serous, clear cell, and carcinosarcoma) | Surgery
Stage I and stage II endometrial cancer | Grade 3 (includes serous, clear cell, and carcinosarcoma) | Postoperative chemotherapy with or without radiation therapy
Stage III, stage IV, and recurrent endometrial cancer | Operable disease | Surgery followed by chemotherapy or radiation therapy
Stage III, stage IV, and recurrent endometrial cancer | Inoperable disease | Chemotherapy and radiation therapy
Stage III, stage IV, and recurrent endometrial cancer | Inoperable disease in which the patient is not a candidate for radiation therapy | Hormone therapy
Stage III, stage IV, and recurrent endometrial cancer | Inoperable disease in which the patient is not a candidate for radiation therapy | Biological therapy
Stage III, stage IV, and recurrent endometrial cancer | Advanced or recurrent disease | Immunotherapy
Stage III, stage IV, and recurrent endometrial cancer | Advanced or recurrent disease | Clinical trials

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

### References

Martin-Hirsch PP, Bryant A, Keep SL, et al.: Adjuvant progestagens for endometrial cancer. Cochrane Database Syst Rev (6): CD001040, 2011.21678331

## Treatment of Stage I and Stage II Endometrial Cancer

### Treatment Options for Stage I and Stage II Endometrial Cancer

Treatment of stage I and stage II endometrial cancer depends on the grade and histological type.

In the current Fédération Internationale de Gynécologie et d’Obstétrique (FIGO) staging system, stage II describes tumor that invades the cervical stroma; this is equivalent to the prior stage IIB. Almost all randomized trials for early-stage cancer excluded stage IIB patients. As a result, there is a paucity of quality data on which to base clinical decisions for patients with stage II endometrial cancer.

Low-risk histology:

Grades 1 and 2 tumors are considered low-risk unless they have serous or clear cell histologies.

Treatment options for patients with low-risk histological subtypes of stage I endometrial cancer include:

1. Surgery: Hysterectomy with bilateral salpingo-oophorectomy and possible lymph node dissection.
2. Postoperative vaginal brachytherapy.
3. Radiation therapy alone.

Most patients do well with surgery alone. However, patients with stage I disease who have high-risk histologies are at a greater risk of recurrence and are eligible for adjuvant therapy.

High-risk histology:

Grade 3 tumors of any histology and any serous tumors, clear cell tumors, or carcinosarcomas are considered high-risk.

Treatment options for patients with stage I or stage II endometrial cancer who have high-risk histologies include:

1. Surgery: Hysterectomy with bilateral salpingo-oophorectomy, with pelvic and para-aortic lymph node dissection.
2. Postoperative chemotherapy with or without radiation therapy.

Patients with serous or clear cell histologies have higher rates of recurrence than do patients with other stage I or stage II endometrioid carcinomas. Management guidelines are based on the outcomes reported in institutional case series that used a regimen of adjuvant carboplatin plus paclitaxel, and occasionally, radiation therapy for patients with this histological subtype.[1-9]

Carcinosarcomas have been evaluated in clinical trials both separately and with other sarcomas because of their prior designation in this group. In a nonrandomized Gynecologic Oncology Group (GOG) study of patients with stage I or II carcinosarcomas, patients who underwent pelvic radiation therapy had a significant reduction in recurrences within the radiation treatment field but no improvement in survival.[10] One nonrandomized study that predominantly included patients with carcinosarcomas appeared to show benefit for adjuvant therapy with cisplatin and doxorubicin.[11]

#### Surgery

If the uterine cervix is involved, patients may consider one or more of the following options:

- Standard hysterectomy with bilateral salpingo-oophorectomy, followed by adjuvant radiation therapy.
- Radical hysterectomy.
- Pelvic and para-aortic lymph node dissection.

Single-institution reviews suggest that radical hysterectomy is more beneficial than standard hysterectomy in cases of cervical involvement of the tumor.[12-14]

#### Surgery with or without lymph node sampling

Table 12 highlights the risk of nodal metastasis based on findings at the time of staging surgery:[15]

Table 12. Risk of Nodal Metastasis in Clinical Stage I Endometrial Cancer

Prognostic Group | Patient Characteristics | Risk of Nodal Involvement
A | Grade 1 tumors involving only endometrium | <5%
A | No evidence of intraperitoneal spread | <5%
B | Grade 2–3 tumors | 5%–9% pelvic nodes
B | Invasion of <50% of myometrium | 5%–9% pelvic nodes
B | No intraperitoneal spread | 4% para-aortic nodes
C | Deep muscle invasion | 20%–60% pelvic nodes
C | High-grade tumors | 10%–30% para-aortic nodes
C | Intraperitoneal spread | 10%–30% para-aortic nodes

For patients in Group A, lymph node dissection has limited utility. Conversely, full pelvic and para-aortic lymph node dissection is important for patients in Group C, given the likelihood of positive findings. The difficulty lies in determining how to manage patients in Group B.

There are several accepted surgical approaches for patients with presumed stage I endometrial cancer, with intermediate risk for lymphatic spread.

Both retrospective and prospective data support stratifying patients with presumed stage I endometrial cancer into two groups based on the following characteristics:

- Low risk: Well-differentiated or moderately differentiated tumor and/or depth of myometrial invasion is less than 50% and/or tumor is smaller than 2 cm.
- High risk: Poorly differentiated tumor and/or depth of myometrial invasion is 50% or more and/or tumor is 2 cm or larger.

Evidence (lymph node dissection):

1. In two studies, patients with low-risk cancer had a sufficiently low risk of lymph node metastasis such that lymph node sampling could be omitted. For patients meeting high-risk criteria, a full pelvic and para-aortic lymph node dissection was suggested, given patterns of lymphatic spread.[16,17]
2. An alternative strategy is the use of sentinel lymph node dissection in patients with presumed stage I endometrial cancer.[18] Although this strategy has been widely adopted at various academic centers, a prospective multicenter trial to determine the false-negative rate for this protocol is lacking. For cases in which isolated tumor cells are identified using the sentinel lymph node approach, it is unclear whether treatment is necessary.
3. In patients with high-risk histology (serous, clear cell, carcinosarcoma, or undifferentiated tumors), hysterectomy and bilateral salpingo-oophorectomy with pelvic and para-aortic lymph node dissection is the standard approach.
4. Laparotomy has been the standard surgical approach. However, laparoscopy is now favored because of the improvement in patients' postoperative recovery without significant impact on outcomes.

Evidence (treatment or surgical staging using laparoscopy vs. laparotomy):

1. For patients with early-stage endometrial cancer, several randomized trials have compared total laparoscopic hysterectomy (TLH) with the standard open procedure, total abdominal hysterectomy (TAH). Feasibility of the laparoscopic approach has been confirmed, but this approach is associated with a longer operative time.[15,19,20] TLH has an improved [15,19] or similar [20] adverse event profile and a shorter hospital stay [15,19,20] than does TAH.
  - TLH is associated with less pain and a quicker resumption of daily activities,[20,21] although one study found that most of the gains in quality of life favoring laparoscopy at the 6-week postsurgical period were no longer significant at 6 months.[20,21]
2. A GOG trial (GOG-LAP2 (https://www.cancer.gov/clinicaltrials/NCT00002706)) randomly assigned 2,616 patients with clinical stages I to IIA disease in a 2:1 ratio to comprehensive surgical staging via laparoscopy or laparotomy.[22][Level of evidence A1]
  Time to recurrence was the primary end point, with noninferiority defined as a difference in recurrence rate of less than 5.3% between the two groups at 3 years.
  a. The recurrence rate at 3 years was 10.24% for patients in the laparotomy arm and 11.39% for patients in the laparoscopy arm, with an estimated difference between groups of 1.14% (90% lower bound, -1.278; 95% upper bound, 3.996).
    - Although this difference was lower than the prespecified limit, the statistical requirements for noninferiority were not met because of fewer-than-expected recurrences in both groups.
  b. The 5-year overall survival (OS) rate was 89.8% in both groups.
3. A Cochrane review of the use of laparoscopic staging included four randomized controlled trials that reported OS and progression-free survival (PFS). Ninety percent of the patients were from the GOG-LAP2 trial.[23][Level of evidence A1]
  - Overall, laparoscopy and laparotomy were associated with similar OS and PFS rates.

Future analyses may determine whether there are subgroups of patients for whom there is a clinically significant decrement when laparoscopic staging is used.[22][Level of evidence B1]

#### Postoperative vaginal brachytherapy

Adjuvant radiation therapy reduces the incidence of local and regional recurrence. However, improved survival rates have not been confirmed, and radiation therapy increased toxicity.[24-28] Vaginal cuff brachytherapy is associated with less radiation-related morbidity than is external-beam radiation therapy (EBRT) and has been shown to be equivalent to EBRT in the short term for patients with stage I disease.[29] However, long-term follow up of a randomized trial comparing EBRT plus vaginal brachytherapy (VBT) to VBT alone found decreased OS and increased toxicity in the EBRT plus VBT arm.[30]

Evidence (VBT):

1. Results of two randomized trials that used adjuvant radiation therapy in patients with stage I disease did not show improved survival but did show reduced locoregional recurrence (3%–4% in the radiation therapy group vs. 12%–14% in the control group after median follow-up of 5–6 years; P < .001), with an increase in side effects.[27,31,32][Level of evidence B1]
2. Results of a study by the Danish Endometrial Cancer Group suggest that the absence of radiation therapy does not improve the survival of patients with stage I intermediate-risk disease (grades 1 and 2 with >50% myometrial invasion or grade 3 with <50% myometrial invasion).[33]
3. The PORTEC-2 (https://www.cancer.gov/clinicaltrials/NCT00411138) trial (NCT00411138) randomly assigned patients with stage I endometrial cancer who did not undergo lymph node dissection to undergo VBT or EBRT, with prevention of vaginal recurrence as the primary outcome.[29,34][Level of evidence A1]
  - At 5 years, there was no difference in the rates of vaginal recurrence, locoregional recurrence, PFS, or OS (84.8% [95% confidence interval (CI), 79.3%–90.3%] for VBT vs. 79.6% [95% CI, 71.2%–88.0%] for EBRT; P = .57).
  - The VBT group had significantly fewer gastrointestinal toxic effects and improved quality of life, making VBT the preferred option for adjuvant treatment of patients with stage I disease.
4. The Norwegian Radium Hospital trial included 568 patients with clinical stage I endometrial cancer between 1968 and 1974 (before FIGO surgical staging was initiated).[30][Level of evidence A1] After hysterectomy and bilateral salpingo-oophorectomy, patients were randomly assigned to receive either EBRT and VBT or VBT alone.
  - An updated report presenting over 20 years of follow-up data showed no difference in OS between the treatment groups. Median OS was 20.5 years in the EBRT/VBT group and 20.48 in the VBT-alone group (P = .186). In all women, there was an increased risk of secondary cancers after EBRT (hazard ratio [HR], 1.42; 95% CI, 1.01–2.0).
  - A post hoc subset analysis of women younger than 60 years at the time of trial registration showed increased mortality in the EBRT/VBT arm (HR, 1.36; 95% CI, 1.06–1.76). Further, the risk of secondary cancers doubled in this group (HR, 2.02; 95% CI, 1.3–3.15).

#### Postoperative radiation therapy

If the cervix is not clinically involved, but extension to the cervix is noted on postoperative pathology, radiation therapy is considered.[22][Level of evidence A1]

#### Radiation therapy alone

Patients who have medical contraindications to surgery may be treated with radiation therapy alone, but cure rates may be lower than those attained with surgery.[35-37]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Kiess AP, Damast S, Makker V, et al.: Five-year outcomes of adjuvant carboplatin/paclitaxel chemotherapy and intravaginal radiation for stage I-II papillary serous endometrial cancer. Gynecol Oncol 127 (2): 321-5, 2012.22850412
Boruta DM, Gehrig PA, Fader AN, et al.: Management of women with uterine papillary serous cancer: a Society of Gynecologic Oncology (SGO) review. Gynecol Oncol 115 (1): 142-53, 2009.19592079
Huh WK, Powell M, Leath CA, et al.: Uterine papillary serous carcinoma: comparisons of outcomes in surgical Stage I patients with and without adjuvant therapy. Gynecol Oncol 91 (3): 470-5, 2003.14675664
Fader AN, Drake RD, O'Malley DM, et al.: Platinum/taxane-based chemotherapy with or without radiation therapy favorably impacts survival outcomes in stage I uterine papillary serous carcinoma. Cancer 115 (10): 2119-27, 2009.19306417
Kelly MG, O'malley DM, Hui P, et al.: Improved survival in surgical stage I patients with uterine papillary serous carcinoma (UPSC) treated with adjuvant platinum-based chemotherapy. Gynecol Oncol 98 (3): 353-9, 2005.16005947
Havrilesky LJ, Secord AA, Bae-Jump V, et al.: Outcomes in surgical stage I uterine papillary serous carcinoma. Gynecol Oncol 105 (3): 677-82, 2007.17355889
Dietrich CS, Modesitt SC, DePriest PD, et al.: The efficacy of adjuvant platinum-based chemotherapy in Stage I uterine papillary serous carcinoma (UPSC). Gynecol Oncol 99 (3): 557-63, 2005.16154185
Townamchai K, Berkowitz R, Bhagwat M, et al.: Vaginal brachytherapy for early stage uterine papillary serous and clear cell endometrial cancer. Gynecol Oncol 129 (1): 18-21, 2013.23262378
Barney BM, Petersen IA, Mariani A, et al.: The role of vaginal brachytherapy in the treatment of surgical stage I papillary serous or clear cell endometrial cancer. Int J Radiat Oncol Biol Phys 85 (1): 109-15, 2013.22543202
Hornback NB, Omura G, Major FJ: Observations on the use of adjuvant radiation therapy in patients with stage I and II uterine sarcoma. Int J Radiat Oncol Biol Phys 12 (12): 2127-30, 1986.3793549 87083034
Peters WA, Rivkin SE, Smith MR, et al.: Cisplatin and adriamycin combination chemotherapy for uterine stromal sarcomas and mixed mesodermal tumors. Gynecol Oncol 34 (3): 323-7, 1989.2767523 89357623
Ayhan A, Taskiran C, Celik C, et al.: The long-term survival of women with surgical stage II endometrioid type endometrial cancer. Gynecol Oncol 93 (1): 9-13, 2004.15047207
Eltabbakh GH, Moore AD: Survival of women with surgical stage II endometrial cancer. Gynecol Oncol 74 (1): 80-5, 1999.10385555
Orezzoli JP, Sioletic S, Olawaiye A, et al.: Stage II endometrioid adenocarcinoma of the endometrium: clinical implications of cervical stromal invasion. Gynecol Oncol 113 (3): 316-23, 2009.19345400
Walker JL, Piedmonte MR, Spirtos NM, et al.: Laparoscopy compared with laparotomy for comprehensive surgical staging of uterine cancer: Gynecologic Oncology Group Study LAP2. J Clin Oncol 27 (32): 5331-6, 2009.19805679
Mariani A, Dowdy SC, Cliby WA, et al.: Prospective assessment of lymphatic dissemination in endometrial cancer: a paradigm shift in surgical staging. Gynecol Oncol 109 (1): 11-8, 2008.18304622
Mariani A, Webb MJ, Keeney GL, et al.: Low-risk corpus cancer: is lymphadenectomy or radiotherapy necessary? Am J Obstet Gynecol 182 (6): 1506-19, 2000.10871473
Barlin JN, Khoury-Collado F, Kim CH, et al.: The importance of applying a sentinel lymph node mapping algorithm in endometrial cancer staging: beyond removal of blue nodes. Gynecol Oncol 125 (3): 531-5, 2012.22366409
Janda M, Gebski V, Brand A, et al.: Quality of life after total laparoscopic hysterectomy versus total abdominal hysterectomy for stage I endometrial cancer (LACE): a randomised trial. Lancet Oncol 11 (8): 772-80, 2010.20638899
Mourits MJ, Bijen CB, Arts HJ, et al.: Safety of laparoscopy versus laparotomy in early-stage endometrial cancer: a randomised trial. Lancet Oncol 11 (8): 763-71, 2010.20638901
Kornblith AB, Huang HQ, Walker JL, et al.: Quality of life of patients with endometrial cancer undergoing laparoscopic international federation of gynecology and obstetrics staging compared with laparotomy: a Gynecologic Oncology Group study. J Clin Oncol 27 (32): 5337-42, 2009.19805678
Walker JL, Piedmonte MR, Spirtos NM, et al.: Recurrence and survival after random assignment to laparoscopy versus laparotomy for comprehensive surgical staging of uterine cancer: Gynecologic Oncology Group LAP2 Study. J Clin Oncol 30 (7): 695-700, 2012.22291074
Galaal K, Bryant A, Fisher AD, et al.: Laparoscopy versus laparotomy for the management of early stage endometrial cancer. Cochrane Database Syst Rev 9: CD006655, 2012.22972096
Aalders J, Abeler V, Kolstad P, et al.: Postoperative external irradiation and prognostic parameters in stage I endometrial carcinoma: clinical and histopathologic study of 540 patients. Obstet Gynecol 56 (4): 419-27, 1980.6999399 81031423
Morrow CP, Bundy BN, Kurman RJ, et al.: Relationship between surgical-pathological risk factors and outcome in clinical stage I and II carcinoma of the endometrium: a Gynecologic Oncology Group study. Gynecol Oncol 40 (1): 55-65, 1991.1989916 91115216
Marchetti DL, Caglar H, Driscoll DL, et al.: Pelvic radiation in stage I endometrial adenocarcinoma with high-risk attributes. Gynecol Oncol 37 (1): 51-4, 1990.2323613 90215375
Creutzberg CL, van Putten WL, Koper PC, et al.: Surgery and postoperative radiotherapy versus surgery alone for patients with stage-1 endometrial carcinoma: multicentre randomised trial. PORTEC Study Group. Post Operative Radiation Therapy in Endometrial Carcinoma. Lancet 355 (9213): 1404-11, 2000.10791524 20250163
Kong A, Johnson N, Kitchener HC, et al.: Adjuvant radiotherapy for stage I endometrial cancer: an updated Cochrane systematic review and meta-analysis. J Natl Cancer Inst 104 (21): 1625-34, 2012.22962693
Nout RA, Smit VT, Putter H, et al.: Vaginal brachytherapy versus pelvic external beam radiotherapy for patients with endometrial cancer of high-intermediate risk (PORTEC-2): an open-label, non-inferiority, randomised trial. Lancet 375 (9717): 816-23, 2010.20206777
Onsrud M, Cvancarova M, Hellebust TP, et al.: Long-term outcomes after pelvic radiation for early-stage endometrial cancer. J Clin Oncol 31 (31): 3951-6, 2013.24019546
Keys HM, Roberts JA, Brunetto VL, et al.: A phase III trial of surgery with or without adjunctive external pelvic radiation therapy in intermediate risk endometrial adenocarcinoma: a Gynecologic Oncology Group study. Gynecol Oncol 92 (3): 744-51, 2004.14984936
Scholten AN, van Putten WL, Beerman H, et al.: Postoperative radiotherapy for Stage 1 endometrial carcinoma: long-term outcome of the randomized PORTEC trial with central pathology review. Int J Radiat Oncol Biol Phys 63 (3): 834-8, 2005.15927414
Bertelsen K, Ortoft G, Hansen ES: Survival of Danish patients with endometrial cancer in the intermediate-risk group not given postoperative radiotherapy: the Danish Endometrial Cancer Study (DEMCA). Int J Gynecol Cancer 21 (7): 1191-9, 2011.21885985
Nout RA, Putter H, Jürgenliemk-Schulz IM, et al.: Five-year quality of life of endometrial cancer patients treated in the randomised Post Operative Radiation Therapy in Endometrial Cancer (PORTEC-2) trial and comparison with norm data. Eur J Cancer 48 (11): 1638-48, 2012.22176868
Eltabbakh GH, Piver MS, Hempling RE, et al.: Excellent long-term survival and absence of vaginal recurrences in 332 patients with low-risk stage I endometrial adenocarcinoma treated with hysterectomy and vaginal brachytherapy without formal staging lymph node sampling: report of a prospective trial. Int J Radiat Oncol Biol Phys 38 (2): 373-80, 1997.9226326 97369885
Stokes S, Bedwinek J, Kao MS, et al.: Treatment of stage I adenocarcinoma of the endometrium by hysterectomy and adjuvant irradiation: a retrospective analysis of 304 patients. Int J Radiat Oncol Biol Phys 12 (3): 339-44, 1986.3957733 86167671
Grigsby PW, Kuske RR, Perez CA, et al.: Medically inoperable stage I adenocarcinoma of the endometrium treated with radiotherapy alone. Int J Radiat Oncol Biol Phys 13 (4): 483-8, 1987.3558039 87165251

## Treatment of Stage III, Stage IV, and Recurrent Endometrial Cancer

### Treatment Options for Stage III, Stage IV, and Recurrent Endometrial Cancer

Treatment options for patients with stage III, stage IV, and recurrent endometrial cancer include:

1. Surgery followed by chemotherapy or radiation therapy.
2. Chemotherapy and radiation therapy.
3. Hormone therapy.
4. Biological therapy.
5. Immunotherapy.
6. Clinical trials.

Treatment of patients with stage IV endometrial cancer is dictated by the site of metastatic disease and symptoms related to disease sites.

#### Surgery followed by chemotherapy or radiation therapy

In general, patients with stage III or stage IV endometrial cancer are treated with surgery, followed by chemotherapy, radiation therapy, or both. Observational studies support maximal cytoreductive surgery for patients with stage IV disease, although these conclusions need to be interpreted with care because of the small number of cases and likely selection bias.[1,2]

For many years, radiation therapy was the standard adjuvant treatment for patients with endometrial cancer. However, several randomized trials have confirmed improved survival when adjuvant chemotherapy is used instead of radiation therapy.

Doxorubicin was historically the most active anticancer agent used, with useful but temporary responses obtained in as many as 33% of patients with recurrent disease. Paclitaxel, when combined with platinum chemotherapy or when used as a single agent, also has significant anticancer activity.[3]

Evidence (surgery followed by chemotherapy or radiation therapy):

1. Several randomized trials by the Gynecologic Oncology Group (GOG) have used doxorubicin because of its known antitumor activity.[4]
  - Adding cisplatin to doxorubicin increased response rates and progression-free survival (PFS) when compared with doxorubicin alone. However, adding cisplatin did not affect overall survival (OS).
2. A three-drug regimen of doxorubicin, cisplatin, and paclitaxel with granulocyte-colony stimulating factor (G-CSF) was significantly superior to cisplatin and doxorubicin, as shown by the following results:[5,6][Level of evidence B3]
  - Response rate was 57% with the three-drug regimen, compared with 34% with the cisplatin and doxorubicin regimen.
  - PFS was 8.3 months with the three-drug regimen, compared with 5.3 months with the cisplatin and doxorubicin regimen.
  - OS was 15.3 months with the three-drug regimen, compared with 12.3 months with the cisplatin and doxorubicin regimen.
  - The 3-drug regimen was associated with grade 3 peripheral neuropathy in 12% of patients and grade 2 peripheral neuropathy in 27% of patients.
  Given the toxicity and limited efficacy of these regimens, other treatment options have been widely sought. Several observational studies [7,8] and phase II studies [9-12] suggest clinical activity with the combination of platinum chemotherapy and paclitaxel in patients with endometrial cancer and measurable disease either after primary surgery or at recurrence.
3. The phase III, randomized, open-label, noninferiority GOG-0209 (https://www.cancer.gov/clinicaltrials/NCT00063999) trial (NCT000063999) compared the combination of paclitaxel, doxorubicin, cisplatin (TAP), and G-CSF with carboplatin and paclitaxel (TC) in 1,381 women.[13]
  - The median OS was 37 months for patients in the TC group and 41 months for patients in the TAP group (hazard ratio [HR], 1.002; 90% confidence interval [CI], 0.9–1.12). The median PFS was 13 months for patients in the TC group and 14 months for patients in the TAP group (HR, 1.032; 90% CI, 0.93–1.15).[13]
  - These results led to the use of TC as the standard adjuvant treatment for patients with stages III and IV disease.
4. The use of cisplatin and doxorubicin compared with whole-abdominal radiation therapy was studied in a trial of patients with stage III or IV disease with residual tumors smaller than 2 cm and no parenchymal organ involvement.[14][Level of evidence A1]
  - Results suggest that cisplatin and doxorubicin improved OS, compared with whole-abdominal radiation therapy (adjusted HR, 0.68; 95% CI, 0.52–0.89; P = .02; 5-year survival rates of 55% for cisplatin and doxorubicin vs. 42% for whole-abdominal radiation).
5. Several trials support combination chemotherapy for patients with stage III, stage IV, and recurrent carcinosarcoma.
  a. The GOG-108 trial of ifosfamide, with or without cisplatin, as first-line therapy in patients with measurable advanced or recurrent carcinosarcomas demonstrated a higher response rate (54% vs. 34%) and longer PFS in the combination arm (6 months vs. 4 months), but there was no significant improvement in survival (9 months vs. 8 months).[15][Level of evidence A1]
  b. The follow-up GOG-0161 (https://www.cancer.gov/clinicaltrials/NCT00003128) study (NCT00003128) used 3-day ifosfamide regimens (instead of the more-toxic 5-day regimen in the preceding study) for the control and ifosfamide combined with paclitaxel (with G-CSF starting on day 4) for the study arm.[16]
    - The combination regimen produced superior response rates (45% vs. 29%), PFS (8.4 months vs. 5.8 months), and OS (13.5 months vs. 8.4 months). The HR for death also favored the combination regimen (HR, 0.69; 95% CI, 0.49–0.97).[16][Level of evidence A1]
    - In this study, 52% of 179 evaluable patients had recurrent disease, 18% had stage III disease, and 30% had stage IV disease. In addition, there were imbalances between the treatment arms with respect to the sites of disease and the use of prior radiation therapy, and 30 patients were excluded for wrong pathology.

#### Chemotherapy and radiation therapy

Patients with inoperable disease caused by tumor that extends to the pelvic wall may be treated with a combination of chemotherapy and radiation therapy. The usual approach for radiation therapy is a combination of intracavitary and external-beam radiation therapy (EBRT).[17,18]

For patients with localized recurrences (pelvic and para-aortic lymph nodes) or distant metastases in selected sites, radiation therapy may be an effective palliative therapy. Pelvic radiation therapy may be curative in pure vaginal recurrence when no previous radiation therapy has been used.

#### Hormone therapy

Progesterone and estrogen hormone receptors are commonly found in endometrial carcinoma tissues. Response to hormone therapy is correlated with the presence and level of hormone receptors and the degree of tumor differentiation.[19] Patients with tumors that are positive for estrogen and progesterone receptors respond best to progestin therapy.

When distant metastases, especially pulmonary metastases, are present, hormonal therapy is indicated. Patients who are not candidates for either surgery or radiation therapy may be treated with progestational agents, the most common hormonal treatment. Progestational agents produce good antitumor responses in 15% to 30% of patients. These responses are associated with significant improvement in survival.[19]

Standard progestational agents include:[19]

- Hydroxyprogesterone.
- Medroxyprogesterone.
- Megestrol.

Evidence (progestin therapy):

1. One study followed 115 patients with advanced endometrial cancer treated with progestins.[20]
  - Responses occurred in 75% of patients (42 of 56) with progesterone receptor–positive tumors.
  - Responses occurred in 7% of patients (4 of 59) without detectable progesterone receptors.

A receptor-poor status may predict a poor response to progestins and a better response to cytotoxic chemotherapy.[21]

Other hormonal agents have shown benefit in treating endometrial cancer. Tamoxifen (20 mg bid) yields a 20% response rate in patients who do not respond to standard progesterone therapy.[22]

Aromatase inhibitors have also been evaluated for the treatment of advanced and recurrent endometrial cancer, although they yield lower response rates than progestational agents.[23]

#### Biological therapy

Several biological agents have been evaluated for the treatment of endometrial cancer.

1. Mammalian target of rapamycin (mTOR) inhibitors.
  Endometrial cancers often show alterations in the AKT-PI3K pathway, making mTOR inhibitors an attractive choice for clinical study in patients with metastatic or recurrent disease. Phase II studies of single-agent everolimus [24] and ridaforolimus [25,26] have predominantly shown disease stabilization. A phase II study of the combination of everolimus and letrozole showed a 32% response rate.[27][Level of evidence C3]
2. Bevacizumab.
  - Bevacizumab was used as a single agent in a phase II trial. The overall response rate was 13.5%.[28][Level of evidence C3]
  - Bevacizumab combined with temsirolimus has been used.[29]

#### Immunotherapy

With the published results of The Cancer Genome Atlas, and as more is learned about the molecular drivers of endometrial cancer, the use of immunotherapy has been evaluated for the treatment of advanced and recurrent disease.

Evidence (immunotherapy):

1. Study 309/KEYNOTE-775 (https://www.cancer.gov/clinicaltrials/NCT03517449) (NCT03517449) was a large, international, multicenter, randomized trial that compared the combination of pembrolizumab (200mg intravenously [IV] every 3 weeks for up to 35 cycles) and lenvatinib (20mg orally daily) with physician's choice of chemotherapy. The study enrolled women with advanced or recurrent endometrial cancer who had disease progression after a platinum-based regimen (measurable disease was required). All histologies except carcinosarcoma and sarcoma were permitted. Patients were stratified by mismatch repair (MMR) status. The two primary end points were PFS and OS.[30]
  - After a median follow-up of approximately 12 months in both groups, survivals were statistically longer for patients in the pembrolizumab-lenvatinib group. The benefit persisted despite the patients' MMR statuses. Among all patients, the median PFS was 7.3 months for patients who received pembrolizumab and lenvatinib and 3.8 months for patients who received chemotherapy (HR, 0.56; 95% CI, 0.48–0.66; P < .001). The median OS was 18.7 months for patients who received pembrolizumab and lenvatinib and 11.9 months for patients who received chemotherapy (HR, 0.65; 95% CI, 0.55–0.77; P < .001).[30][Level of evidence A1]
  - The most frequent serious side effect in the experimental group was hypertension.
2. The double-blind placebo-controlled KEYNOTE-868 (https://www.cancer.gov/clinicaltrials/NCT03914612) study (NCT03914612) included 810 patients with advanced (stage III, stage IVA, or stage IVB) or recurrent endometrial cancer.[31] Patients were randomly assigned to receive six cycles of paclitaxel and carboplatin with either pembrolizumab or placebo. Afterwards, patients received up to 14 cycles of maintenance therapy with pembrolizumab or placebo. Patients were stratified according to MMR statuses (proficient [pMMR; n =588] or deficient [dMMR; n = 222]) to investigate if the checkpoint inhibitor, pembrolizumab, was efficacious in patients with dMMR tumors.
  - After a median follow-up of 12.0 months, the 1-year PFS for patients with dMMR tumors was 74% in the pembrolizumab group and 38% in the placebo group (HR, 0.30; 95% CI, 0.19–0.48; P < .001).[31][Level of evidence B1]
  - After a median follow-up of 7.9 months, the median PFS for patients with pMMR tumors was 13.1 months in the pembrolizumab group and 8.7 months in the placebo group (HR, 0.54; 95% CI, 0.41–0.71; P < .001).[31][Level of evidence B1]
  - Regardless of MMR status, pembrolizumab showed significant PFS improvement in patients with advanced or recurrent endometrial cancer.
3. The phase III randomized KEYNOTE-B21 (https://www.cancer.gov/clinicaltrials/NCT04634877) trial (NCT04634877) included 1,095 patients with newly diagnosed high-risk stage I to stage IVA endometrial cancer (including carcinosarcoma) without evidence of disease postsurgery. All patients received either six cycles of chemotherapy with optional EBRT or four cycles of chemotherapy followed by chemoradiation therapy. Vaginal brachytherapy was allowed in both groups. Patients were randomly assigned to receive either adjuvant pembrolizumab or placebo every 3 weeks for six cycles, then every 6 weeks for six cycles. A total of 66% of patients had stage III or stage IVA disease, 26% had dMMR tumors, and 67% were treated with radiation therapy.[32,33]
  - After a median follow-up of 24 months, the 2-year disease-free survival (DFS) rate was 75% in the pembrolizumab group and 76% in the placebo group (HR, 1.02; 95% CI, 0.79–1.32; P = .57).[33][Level of evidence B1]
  - In the dMMR cohort, the 2-year DFS rate was 92.4% in the pembrolizumab group and 80.2% in the placebo group (HR, 0.31; 95% CI, 0.14–0.69).
  - No other predetermined subgroup benefitted from adding pembrolizumab.
  This study evaluated giving pembrolizumab to patients with positive lymph nodes after surgery who had no other visible evidence of disease. It also evaluated combining radiation therapy and pembrolizumab. Results were significant because they expanded the population of patients who can receive pembrolizumab.
4. The RUBY (https://www.cancer.gov/clinicaltrials/NCT03981796) trial (NCT03981796) was a large multicenter trial in women with Fédération Internationale de Gynécologie et d’Obstétrique stage III, IV, or recurrent endometrial cancer of all histologies not amenable to curative therapy. Unlike the Study 309/KEYNOTE-775 trial, some patients without measurable disease qualified for inclusion. Women were randomly assigned to receive TC with or without dostarlimab (500 mg IV) every 3 weeks for six cycles followed by maintenance dostarlimab (1,000 mg IV every 6 weeks) for up to 3 years. Patients were stratified by MMR status. The primary end point was PFS.[34]
  - After a median follow-up of approximately 2 years, the dostarlimab group from the overall population had a 36% lower risk of progression or death (HR, 0.64; 95% CI, 0.51–0.80; P < .001). The dostarlimab group from the dMMR population had a 72% lower risk of progression or death (HR, 0.28; 95% CI, 0.16–0.50; P < .001). Similar benefit was seen in OS (HR, 0.64; 95% CI, 0.46–0.87, P = .0021 for the overall population; HR, 0.30; 95% CI, 0.13–0.70 for dMMR population).[34][Level of evidence B1]

These three studies demonstrate the activity and benefit of immunotherapy in the treatment of patients with advanced stage and recurrent endometrial cancer. These results may also facilitate the incorporation of such treatments into the up-front setting. More data are needed to help discern the role of immunotherapy in patients who historically would be managed with radiation therapy as part of the treatment plan.

#### Clinical trials

All patients with advanced disease should consider clinical trials that evaluate single-agent or combination therapy for this disease.

Studies of treatment failure patterns have found a high rate of distant metastases in the upper abdomen and in extra-abdominal sites.[35] For this reason, patients with stage III disease may be candidates for innovative clinical trials.

Treatment options under clinical evaluation for stage IV endometrial cancer include the following agents:

1. Paclitaxel and carboplatin with or without metformin in stages III, IV, and recurrent endometrial cancer (GOG-0286B (https://www.cancer.gov/clinicaltrials/NCT02065687) [NCT02065687]).
2. PI3K/mTOR inhibitor in recurrent or persistent endometrial cancer (15-079 (https://www.cancer.gov/clinicaltrials/NCT02549989) [NCT02549989]).
3. Everolimus and letrozole or hormonal therapy in recurrent or persistent endometrial cancer (GOG-3007 (https://www.cancer.gov/clinicaltrials/NCT02228681) [NCT02228681]).
4. Everolimus, letrozole, and metformin in advanced or recurrent endometrial cancer (2012-0543 (https://www.cancer.gov/clinicaltrials/NCT01797523) [NCT01797523]).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Shih KK, Yun E, Gardner GJ, et al.: Surgical cytoreduction in stage IV endometrioid endometrial carcinoma. Gynecol Oncol 122 (3): 608-11, 2011.21664663
Barlin JN, Puri I, Bristow RE: Cytoreductive surgery for advanced or recurrent endometrial cancer: a meta-analysis. Gynecol Oncol 118 (1): 14-8, 2010.20434198
Ball HG, Blessing JA, Lentz SS, et al.: A phase II trial of paclitaxel in patients with advanced or recurrent adenocarcinoma of the endometrium: a Gynecologic Oncology Group study. Gynecol Oncol 62 (2): 278-81, 1996.8751561 96350573
Thigpen JT, Brady MF, Homesley HD, et al.: Phase III trial of doxorubicin with or without cisplatin in advanced endometrial carcinoma: a Gynecologic Oncology Group study. J Clin Oncol 22 (19): 3902-8, 2004.15459211
Fleming GF, Brunetto VL, Cella D, et al.: Phase III trial of doxorubicin plus cisplatin with or without paclitaxel plus filgrastim in advanced endometrial carcinoma: a Gynecologic Oncology Group Study. J Clin Oncol 22 (11): 2159-66, 2004.15169803
Fleming GF, Filiaci VL, Bentley RC, et al.: Phase III randomized trial of doxorubicin + cisplatin versus doxorubicin + 24-h paclitaxel + filgrastim in endometrial carcinoma: a Gynecologic Oncology Group study. Ann Oncol 15 (8): 1173-8, 2004.15277255
Arimoto T, Nakagawa S, Yasugi T, et al.: Treatment with paclitaxel plus carboplatin, alone or with irradiation, of advanced or recurrent endometrial carcinoma. Gynecol Oncol 104 (1): 32-5, 2007.16996113
Sovak MA, Hensley ML, Dupont J, et al.: Paclitaxel and carboplatin in the adjuvant treatment of patients with high-risk stage III and IV endometrial cancer: a retrospective study. Gynecol Oncol 103 (2): 451-7, 2006.16677690
Hoskins PJ, Swenerton KD, Pike JA, et al.: Paclitaxel and carboplatin, alone or with irradiation, in advanced or recurrent endometrial cancer: a phase II study. J Clin Oncol 19 (20): 4048-53, 2001.11600606
Pectasides D, Xiros N, Papaxoinis G, et al.: Carboplatin and paclitaxel in advanced or metastatic endometrial cancer. Gynecol Oncol 109 (2): 250-4, 2008.18299146
Nomura H, Aoki D, Takahashi F, et al.: Randomized phase II study comparing docetaxel plus cisplatin, docetaxel plus carboplatin, and paclitaxel plus carboplatin in patients with advanced or recurrent endometrial carcinoma: a Japanese Gynecologic Oncology Group study (JGOG2041). Ann Oncol 22 (3): 636-42, 2011.20696677
Dimopoulos MA, Papadimitriou CA, Georgoulias V, et al.: Paclitaxel and cisplatin in advanced or recurrent carcinoma of the endometrium: long-term results of a phase II multicenter study. Gynecol Oncol 78 (1): 52-7, 2000.10873410
Miller DS, Filiaci VL, Mannel RS, et al.: Carboplatin and Paclitaxel for Advanced Endometrial Cancer: Final Overall Survival and Adverse Event Analysis of a Phase III Trial (NRG Oncology/GOG0209). J Clin Oncol 38 (33): 3841-3850, 2020.33078978
Randall ME, Filiaci VL, Muss H, et al.: Randomized phase III trial of whole-abdominal irradiation versus doxorubicin and cisplatin chemotherapy in advanced endometrial carcinoma: a Gynecologic Oncology Group Study. J Clin Oncol 24 (1): 36-44, 2006.16330675
Sutton G, Brunetto VL, Kilgore L, et al.: A phase III trial of ifosfamide with or without cisplatin in carcinosarcoma of the uterus: A Gynecologic Oncology Group Study. Gynecol Oncol 79 (2): 147-53, 2000.11063636 20519489
Homesley HD, Filiaci V, Markman M, et al.: Phase III trial of ifosfamide with or without paclitaxel in advanced uterine carcinosarcoma: a Gynecologic Oncology Group Study. J Clin Oncol 25 (5): 526-31, 2007.17290061
Wegner RE, Beriwal S, Heron DE, et al.: Definitive radiation therapy for endometrial cancer in medically inoperable elderly patients. Brachytherapy 9 (3): 260-5, 2010 Jul-Sep.20122872
Kupelian PA, Eifel PJ, Tornos C, et al.: Treatment of endometrial carcinoma with radiation therapy alone. Int J Radiat Oncol Biol Phys 27 (4): 817-24, 1993.8244810
Lentz SS: Advanced and recurrent endometrial carcinoma: hormonal therapy. Semin Oncol 21 (1): 100-6, 1994.8310300 94143746
Kauppila A: Oestrogen and progestin receptors as prognostic indicators in endometrial cancer. A review of the literature. Acta Oncol 28 (4): 561-6, 1989.2675940 90000882
Kauppila A, Friberg LG: Hormonal and cytotoxic chemotherapy for endometrial carcinoma. Steroid receptors in the selection of appropriate therapy. Acta Obstet Gynecol Scand Suppl 101: 59-64, 1981.6946673 82064670
Quinn MA, Campbell JJ: Tamoxifen therapy in advanced/recurrent endometrial carcinoma. Gynecol Oncol 32 (1): 1-3, 1989.2909443 89079077
Lindemann K, Malander S, Christensen RD, et al.: Examestane in advanced or recurrent endometrial carcinoma: a prospective phase II study by the Nordic Society of Gynecologic Oncology (NSGO). BMC Cancer 14: 68, 2014.24498853
Slomovitz BM, Lu KH, Johnston T, et al.: A phase 2 study of the oral mammalian target of rapamycin inhibitor, everolimus, in patients with recurrent endometrial carcinoma. Cancer 116 (23): 5415-9, 2010.20681032
Colombo N, McMeekin DS, Schwartz PE, et al.: Ridaforolimus as a single agent in advanced endometrial cancer: results of a single-arm, phase 2 trial. Br J Cancer 108 (5): 1021-6, 2013.23403817
Tsoref D, Welch S, Lau S, et al.: Phase II study of oral ridaforolimus in women with recurrent or metastatic endometrial cancer. Gynecol Oncol 135 (2): 184-9, 2014.25173583
Slomovitz BM, Jiang Y, Yates MS, et al.: Phase II study of everolimus and letrozole in patients with recurrent endometrial carcinoma. J Clin Oncol 33 (8): 930-6, 2015.25624430
Aghajanian C, Sill MW, Darcy KM, et al.: Phase II trial of bevacizumab in recurrent or persistent endometrial cancer: a Gynecologic Oncology Group study. J Clin Oncol 29 (16): 2259-65, 2011.21537039
Alvarez EA, Brady WE, Walker JL, et al.: Phase II trial of combination bevacizumab and temsirolimus in the treatment of recurrent or persistent endometrial carcinoma: a Gynecologic Oncology Group study. Gynecol Oncol 129 (1): 22-7, 2013.23262204
Makker V, Colombo N, Casado Herráez A, et al.: Lenvatinib Plus Pembrolizumab in Previously Treated Advanced Endometrial Cancer: Updated Efficacy and Safety From the Randomized Phase III Study 309/KEYNOTE-775. J Clin Oncol 41 (16): 2904-2910, 2023.37058687
Eskander RN, Sill MW, Beffa L, et al.: Pembrolizumab plus Chemotherapy in Advanced Endometrial Cancer. N Engl J Med 388 (23): 2159-2170, 2023.36972022
Van Gorp T, Cibula D, Lv W, et al.: ENGOT-en11/GOG-3053/KEYNOTE-B21: a randomised, double-blind, phase III study of pembrolizumab or placebo plus adjuvant chemotherapy with or without radiotherapy in patients with newly diagnosed, high-risk endometrial cancer. Ann Oncol 35 (11): 968-980, 2024.39284383
Slomovitz BM, Cibula D, Lv W, et al.: Pembrolizumab or Placebo Plus Adjuvant Chemotherapy With or Without Radiotherapy for Newly Diagnosed, High-Risk Endometrial Cancer: Results in Mismatch Repair-Deficient Tumors. J Clin Oncol 43 (3): 251-259, 2025.39411812
Mirza MR, Chase DM, Slomovitz BM, et al.: Dostarlimab for Primary Advanced or Recurrent Endometrial Cancer. N Engl J Med 388 (23): 2145-2158, 2023.36972026
Greven KM, Curran WJ, Whittington R, et al.: Analysis of failure patterns in stage III endometrial carcinoma and therapeutic implications. Int J Radiat Oncol Biol Phys 17 (1): 35-9, 1989.2745205 89308156

## Latest Updates to This Summary (02/12/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information About Endometrial Cancer

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Treatment of Stage III, Stage IV, and Recurrent Endometrial Cancer

Revised text about the results of a phase III, randomized, open-label, noninferiority trial that compared the combination of paclitaxel, doxorubicin, cisplatin, and G-CSF with carboplatin and paclitaxel in 1,381 women (cited Miller et al. as reference 13).

The Immunotherapy subsection was extensively revised.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of endometrial cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Endometrial Cancer Treatment are:

- Fumiko Chino, MD (MD Anderson Cancer Center)
- Olga T. Filippova, MD (Lenox Hill Hospital)
- Marina Stasenko, MD (New York University Medical Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Endometrial Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/uterine/hp/endometrial-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389270]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).